# Childhood Heart Tumors (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the treatment of childhood heart tumors. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board.

## What are childhood heart tumors?

Heart tumors (also called cardiac tumors) are rare growths that can form in any part of the heart. They can be benign (not cancerous) or malignant (cancerous). Most heart tumors in children are benign. Although benign tumors do not spread to other parts of the body, they may require treatment to stop them from causing problems with the heart's rhythm and blood flow. Cancerous heart tumors are very rare in children. They can spread to other parts of the body and require more intensive treatment than benign tumors.

Types of benign heart tumors that may occur in a fetus, newborn, or child include:

- Rhabdomyoma is a tumor that forms in muscle made up of long fibers.
- Myxoma is a tumor that may be part of a hereditary syndrome called Carney complex.
- Teratoma is a type of germ cell tumor. In the heart, these tumors form most often in the pericardium (the sac that covers the heart). Some teratomas are cancerous.
- Fibroma is a tumor that forms in fiber-like tissue that holds bones, muscles, and other organs in place.
- Histiocytoid cardiomyopathy tumor is a tumor that forms in the heart cells that control heart rhythm.
- Hemangioma is a tumor that forms in the cells that line blood vessels.
- Neurofibroma is a tumor that forms in the cells and tissues that cover nerves.

The most common benign heart tumors that may occur in a fetus or newborn include rhabdomyoma, myxoma, teratoma, and fibroma. Most rhabdomyomas go away on their own.

Heart tumors are rare tumors that form in the tissues of the heart, including muscle tissue, connective tissue, and tissues that line the blood vessels, control heart rhythm, and cover the nerves of the heart. They may also form in the pericardium (the sac around the heart). Most heart tumors are benign (not cancer), but some may be malignant (cancer).

Anatomy of the heart; a pullout shows the aorta, superior vena cava, pericardium, coronary artery, and inferior vena cava.

Types of cancerous heart tumors that may occur in a fetus, newborn, or child include:

- Malignant teratoma is a type of germ cell tumor. In the heart, these tumors form most often in the pericardium (the sac that covers the heart). Most teratomas are not cancer.
- Primary cardiac lymphoma begins in the heart and/or pericardium (the sac that covers the heart).
- Rhabdomyosarcoma forms in muscle made up of long fibers.
- Angiosarcoma forms in cells that line blood vessels or lymph vessels.
- Undifferentiated pleomorphic sarcoma usually forms in the soft tissue, but it may also form in bone.
- Leiomyosarcoma forms in smooth muscle cells.
- Chondrosarcoma usually forms in bone cartilage, but very rarely can begin in the heart.
- Synovial sarcoma usually forms around joints, but may very rarely form in the heart or sac around the heart.
- Infantile fibrosarcoma forms in fiber-like tissue that holds bones, muscles, and other organs in place.

## Causes and risk factors for childhood heart tumors

Heart tumors in children are caused by certain changes to the way heart cells function, especially how they grow and divide into new cells. Often, the exact cause of the cell changes is unknown. Learn more about how cancer develops at What Is Cancer? (https://www.cancer.gov/about-cancer/understanding/what-is-cancer)

A risk factor is anything that increases the chance of getting a disease. A fetus or newborn can have a higher risk of benign heart tumors if they have a genetic condition called tuberous sclerosis. Another condition, called Carney complex, might also increase a child's risk of a type of benign heart tumor called myxoma. Not all children with these risk factors will get a benign heart tumor, and benign heart tumors may develop in some children who don't have a known risk factor. Talk with your child's doctor if you think your child may be at risk.

There are no known risk factors for cancerous heart tumors in children.

## Symptoms of childhood heart tumors

Most children with a heart tumor will have some signs and symptoms that alert parents of a problem. It's important to check with your child's doctor if your child has:

- a change in the heart's normal rhythm
- trouble breathing, especially when lying down
- pain or tightness in the middle of the chest that feels better when sitting up
- coughing
- fainting
- feeling dizzy, tired, or weak
- fast heart rate
- swelling in the legs, ankles, or abdomen
- signs of a stroke, including sudden:
  - numbness or weakness of the face, arm, or leg (especially on one side of the body)
  - confusion or trouble speaking or understanding
  - trouble seeing with one or both eyes
  - trouble walking or feeling dizzy
  - loss of balance or coordination
  - severe headache for no known reason

These symptoms may be caused by problems other than a heart tumor. The only way to know is to see your child's doctor.

## Tests to diagnose childhood heart tumors

If your child has symptoms that suggest a heart tumor, the doctor will need to find out the cause. The doctor will ask when the symptoms started and how often your child has been having them. They will also ask about your child's personal and family medical history and do a physical exam. Depending on these results, they may recommend other tests. If your child is diagnosed with a heart tumor, the results of these tests will help you and your child's doctor plan treatment.

The tests and procedures used to diagnose heart tumors may include:

### Echocardiogram

An echocardiogram uses high-energy sound waves (ultrasound) that bounce off the heart and nearby tissues or organs and make echoes. A moving picture is made of the heart and heart valves as blood is pumped through the heart.

### CT scan (CAT scan)

A CT scan uses a computer linked to an x-ray machine to make a series of detailed pictures of areas inside the body. The pictures are taken from different angles and are used to create 3-D views of tissues and organs. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography. Learn more about Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet).

Computed tomography (CT) scan. The child lies on a table that slides through the CT scanner, which takes a series of detailed x-ray pictures of areas inside the body.

Computed tomography (CT) scan; drawing shows a child lying on a table that slides through the CT scanner, which takes a series of detailed x-ray pictures of areas inside the body.

### Magnetic resonance imaging (MRI)

MRI uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas of the body, such as the head and neck. This procedure is also called nuclear magnetic resonance imaging (NMRI).

Magnetic resonance imaging (MRI) scan. The child lies on a table that slides into the MRI machine, which takes a series of detailed pictures of areas inside the body. The positioning of the child on the table depends on the part of the body being imaged.

Magnetic resonance imaging (MRI) scan; drawing shows a child lying on a table that slides into the MRI machine, which takes a series of detailed pictures of areas inside the body.

### Chest x-ray

An x-ray is a type of radiation that can go through the body and make pictures. A chest x-ray is one that makes pictures of the organs and bones inside the chest.

### Electrocardiogram (EKG)

An EKG is a recording of the heart's electrical activity to check its rate and rhythm. Small pads (electrodes) are placed on the patient's chest, arms, and legs, and are connected by wires to the EKG machine. Heart activity is then recorded as a line graph on paper. Electrical activity that is faster or slower than normal may be a sign of heart disease or damage.

### Cardiac catheterization

Cardiac catheterization is a procedure to look inside the blood vessels and heart for abnormal areas or cancer. A long, thin, catheter is inserted into an artery or vein in the groin, neck, or arm and threaded through the blood vessels to the heart. A sample of tissue may be removed using a special tool. A pathologist views the tissue under a microscope to look for cancer cells.

## Getting a second opinion

You may want to get a second opinion to confirm your child's diagnosis and treatment plan. If you seek a second opinion, you will need to get medical test results and reports from the first doctor to share with the second doctor. The second doctor will review the pathology report, slides, and scans. They may agree with the first doctor, suggest changes to the treatment plan, or provide more information about your child's tumor.

To learn more about choosing a doctor and getting a second opinion, see Finding Cancer Care (https://www.cancer.gov/about-cancer/managing-care/services). You can contact NCI's Cancer Information Service (https://www.cancer.gov/contact) via chat, email, or phone (both in English and Spanish) for help finding a doctor or hospital that can provide a second opinion. For questions you might want to ask at your child's appointments, see Questions to Ask Your Doctor About Cancer (https://www.cancer.gov/about-cancer/coping/questions).

## Types of treatment for childhood heart tumors

### Who treats children with heart tumors?

A pediatric oncologist, a doctor who specializes in treating children with cancer, oversees treatment of heart tumors. The pediatric oncologist works with other health care providers who are experts in treating children with cancer and who specialize in certain areas of medicine. Other specialists may include:

- pediatrician
- pediatric heart surgeon
- pediatric cardiologist
- radiation oncologist
- pathologist
- pediatric nurse specialist
- social worker
- rehabilitation specialist
- psychologist
- child-life specialist

There are different types of treatment for children and adolescents with heart tumors. You and your child's care team will work together to decide treatment. Many factors will be considered, such as your child's overall health and whether the tumor is newly diagnosed or has come back.

Your child's treatment plan will include information about the tumor, the goals of treatment, treatment options, and the possible side effects. It will be helpful to talk with your child's care team before treatment begins about what to expect. For help every step of the way, see our booklet, Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents).

### Watchful waiting

Watchful waiting is closely monitoring a child's condition without giving any treatment until signs or symptoms appear or change. This treatment may be used for rhabdomyoma (a benign tumor).

### Surgery

When possible, the tumor is removed by surgery. Types of surgery that may be done include:

- Surgery to remove the tumor and some healthy tissue around it.
- Heart transplant. If the child is waiting for a donated heart, they may receive other treatment as needed.

Sometimes chemotherapy may be given before surgery to make a cancerous tumor smaller and decrease the amount of tissue that needs to be removed during surgery. This is called neoadjuvant (preoperative) therapy.

### Chemotherapy

Chemotherapy (also called chemo) uses drugs to stop the growth of cancer cells. Chemotherapy either kills the cancer cells or stops them from dividing. For children with sarcoma, chemotherapy may be given alone or with other types of treatment to reduce the size of the tumor before surgery.

Learn more about Chemotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/chemotherapy).

### Radiation therapy

Radiation therapy uses high-energy x-rays or other types of radiation to kill cancer cells or keep them from growing. Cancerous heart tumors are sometimes treated with external beam radiation therapy. External beam radiation therapy uses a machine outside the body to send radiation toward the area of the body with cancer. Radiation therapy may be used when the cancer cannot be removed by surgery.

Learn more about External Beam Radiation Therapy for Cancer (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/external-beam) and Radiation Therapy Side Effects (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/side-effects).

### Targeted therapy

Targeted therapy uses drugs or other substances to block the action of specific enzymes, proteins, or other molecules involved in the growth of tumor cells.

Targeted therapies used to treat benign heart tumors include:

- everolimus (https://www.cancer.gov/about-cancer/treatment/drugs/everolimus)
- sirolimus

Learn more about Targeted Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/targeted-therapies).

### Clinical trials

For some children, joining a clinical trial may be an option. There are different types of clinical trials for childhood cancer. For example, a treatment trial tests new treatments or new ways of using current treatments. Supportive care and palliative care trials look at ways to improve quality of life, especially for those who have side effects from cancer and its treatment.

You can use the clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials accepting participants. The search allows you to filter trials based on the type of cancer, your child's age, and where the trials are being done. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

Learn more about clinical trials, including how to find and join one, at Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials).

### Treatment of childhood heart tumors

Treatment of newly diagnosed childhood heart tumors may include:

- watchful waiting for children with rhabdomyoma (a benign tumor), which sometimes shrinks and goes away on its own
- targeted therapy (everolimus (https://www.cancer.gov/about-cancer/treatment/drugs/everolimus) or sirolimus) for children with rhabdomyoma or tuberous sclerosis
- chemotherapy followed by surgery (which may include removing some or all of the tumor or a heart transplant) for children with sarcomas
- surgery to completely remove the tumor for children with other types of heart tumors
- radiation therapy for children with cancerous tumors that cannot be removed by surgery

If a cancerous tumor comes back after treatment, your child's doctor will talk with you about what to expect and possible next steps. There may be treatment options that could shrink the tumor or control its growth. If there are no treatments, your child can receive care to control symptoms from cancer so they can be as comfortable as possible.

## Side effects and late effects of treatment

Treatments for heart tumors can cause side effects. Which side effects your child might have depends on the type of treatment they receive, the dose, and how their body reacts. Talk with your child's treatment team about which side effects to look for and ways to manage them.

To learn more about side effects that begin during treatment for cancer, visit Side Effects (https://www.cancer.gov/about-cancer/treatment/side-effects).

Problems from cancer treatment that begin 6 months or later after treatment and continue for months or years are called late effects. Late effects of cancer treatment may include:

- physical problems
- changes in mood, feelings, thinking, learning, or memory
- second cancers (new types of cancer) or other conditions

Some late effects may be treated or controlled. It is important to talk with your child's doctors about the possible late effects caused by some treatments. Learn more about Late Effects of Treatment for Childhood Cancer.

## Follow-up care

As your child goes through treatment, they will have follow-up tests or check-ups. Some of the tests that were done to diagnose the cancer may be repeated to see how well the treatment is working. Decisions about whether to continue, change, or stop treatment may be based on the results of these tests.

Some of the tests will continue to be done from time to time after treatment has ended. The results of these tests can show if your child's condition has changed or if the cancer has recurred (come back).

## Coping with your child's cancer

When your child has a heart tumor, every member of the family needs support. Taking care of yourself during this difficult time is important. Reach out to your child's treatment team and to people in your family and community for support. To learn more, see Support for Families: Childhood Cancer (https://www.cancer.gov/about-cancer/coping/caregiver-support/parents) and the booklet Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents).

## Related resources

For more childhood cancer information and other general cancer resources, see:

- About Cancer (https://www.cancer.gov/about-cancer)
- Childhood Cancers (https://www.cancer.gov/types/childhood-cancers)
- CureSearch for Children's Cancer (http://www.curesearch.org/)
- Adolescents and Young Adults with Cancer (https://www.cancer.gov/types/aya)
- Cancer in Children and Adolescents (https://www.cancer.gov/types/childhood-cancers/child-adolescent-cancers-fact-sheet)
- For Survivors and Caregivers (https://cancercontrol.cancer.gov/ocs/resources/survivors.html)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the treatment of childhood cardiac (heart) tumors. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Pediatric Treatment Editorial Board. PDQ Childhood Heart Tumors. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/cardiac/patient-child-cardiac-treatment-pdq. Accessed <MM/DD/YYYY>.

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).